# Dictionary of Genetics Terms

acrochordon: A small, benign skin growth that may have a stalk (peduncle). Acrochordons most commonly appear on the neck, axillary, groin, and inframammary regions. Also called skin tag.
admixture mapping: A method used to identify genetic variants associated with traits and/or diseases in ethnic groups whose genomes resulted from a recent mixture of two or more geographically distinct ancestral populations.
affected individual: In genetics, describes an individual who has a particular phenotypic trait or disease. The individual expresses the trait or has signs and symptoms of the disease.
allele: One of two or more versions of a genetic sequence at a particular region on a chromosome. An individual inherits two alleles for each gene, one from each parent.
  More Information
  - Allele (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=4)
allelic heterogeneity: The presence of different variants at a single gene locus that cause the same or similar phenotypic expressions of a disease or condition.
aneuploidy: The occurrence of one or more extra or missing chromosomes in a cell or organism. Aneuploidy refers to any chromosome number that is not an exact multiple of the haploid number of chromosomes (which is 23 in humans).
  More Information
  - Can changes in the number of chromosomes affect health and development? (MedlinePlus) (https://medlineplus.gov/genetics/understanding/mutationsanddisorders/chromosomalconditions/)
antioncogene: A type of gene that regulates cell growth. When an antioncogene is mutated, uncontrolled cell growth may occur. This may contribute to the development of cancer. Also called tumor suppressor gene.
  More Information
  - Tumor Suppressor Gene (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Tumor-Suppressor-Gene)
ART: Procedures that use donor or nondonor eggs and sperm to create embryos in vitro. Examples of ART include in vitro fertilization (IVF), gamete intrafallopian transfer (GIFT), and zygote intrafallopian transfer (ZIFT). These procedures may be used prior to preimplantation genetic testing (PGT). Also called assisted reproductive technology.
Ashkenazi Jews: One of two major ancestral groups of Jewish people whose ancestors lived in France and Central and Eastern Europe, including Germany, Poland, and Russia. The other group is called Sephardic Jews and includes those whose ancestors lived in Spain, Portugal, North Africa, and the Middle East. Most Jewish people living in the United States are of Ashkenazi descent.
assisted reproductive technology: Procedures that use donor or nondonor eggs and sperm to create embryos in vitro. Examples of assisted reproductive technology include in vitro fertilization (IVF), gamete intrafallopian transfer (GIFT), and zygote intrafallopian transfer (ZIFT). These procedures may be used prior to preimplantation genetic testing (PGT). Also called ART.
attributable risk: Proportion of a disease in exposed individuals that can be attributed to an exposure. In the context of genetic studies, the "exposure" is the frequency of a specific genetic variant.
autosomal: Having to do with any of the 22 numbered pairs of chromosomes found in most human cells. Autosomal chromosomes are numbered 1-22. The sex chromosomes (X and Y chromosomes) determine whether an individual is male or female and are not considered autosomal chromosomes.
  More Information
  - Autosome (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=13)
autosomal dominant: Autosomal dominant inheritance refers to genetic conditions that occur when a mutation is present in one copy of a given gene (i.e., the person is heterozygous).
  More Information
  - Autosomal Dominant (https://www.genome.gov/glossary/index.cfm?id=12)
autosomal dominant inheritance: One of the ways a genetic trait or a genetic condition can be inherited. In autosomal dominant inheritance, a genetic condition occurs when a variant is present in only one allele (copy) of a given gene.
  More Information
  - Autosomal Dominant (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Autosomal-Dominant)
autosomal recessive inheritance: One of the ways a genetic trait or a genetic condition can be inherited. In autosomal recessive inheritance, a genetic condition occurs when one variant is present on both alleles (copies) of a given gene.
band: When chromosomes at a particular stage in cell division are stained using one of several laboratory techniques, a specific pattern of light and dark stripes (bands) appears when the chromosomes are viewed through a microscope; the banding pattern assists in assigning each chromosome its particular number and evaluating its structure.
base pair: Two nitrogen-containing bases (or nucleotides) that pair together to form the structure of DNA. The four bases in DNA are adenine (A), cytosine (C), guanine (G), and thymine (T). These bases form specific pairs (A with T, and G with C). Base pair may also refer to the actual number of base pairs, such as 8 base pairs, in a sequence of nucleotides.
  More Information
  - Base Pair (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Base-Pair)
biallelic: Of or pertaining to both alleles of a single gene (paternal and maternal). For example, biallelic mutation carriers have a mutation (not necessarily the same mutation) in both copies of a particular gene (a paternal and a maternal mutation).
carrier: In classical genetics, an individual who carries one deleterious allele for an autosomal recessive disorder. In clinical discussions, may refer to an individual who carries a deleterious allele that predisposes to disease.
  More Information
  - Carrier (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=23)
carrier frequency: The proportion of individuals in a population who have a single copy of a specific recessive genetic variant. Carrier frequency also sometimes refers to the prevalence of variants in dominantly acting genes, such as BRCA1 and BRCA2. Also called carrier rate.
carrier rate: The proportion of individuals in a population who have a single copy of a specific recessive genetic variant. Carrier rate also sometimes refers to the prevalence of variants in dominantly acting genes, such as BRCA1 and BRCA2. Also called carrier frequency.
cascade genetic testing: The process of extending genetic testing to individuals at risk within a family for inheriting a pathogenic variant previously identified in a biologic relative. This process is repeated as more pathogenic variant carriers are identified within the family. Cascade genetic testing is sometimes referred to as cascade screening, although cascade genetic testing is the preferred term. Also called cascade testing.
  More Information
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
cascade screening: A systematic process for the identification of individuals within a family at risk for a hereditary condition. Cascade screening begins with finding a pathogenic/likely pathogenic variant through broad-based testing (such as full gene or multigene panel testing) in one family member, usually affected with the condition. Then, testing just for the specific family variant is extended to at-risk biologic relatives. This process is repeated as more affected individuals or pathogenic variant carriers are identified. Cascade screening is sometimes referred to as cascade testing (preferred term).
  More Information
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
cascade testing: The process of extending genetic testing to individuals at risk within a family for inheriting a pathogenic variant previously identified in a biologic relative. This process is repeated as more pathogenic variant carriers are identified within the family. Cascade testing is sometimes referred to as cascade screening, although cascade testing is the preferred term. Also called cascade genetic testing.
  More Information
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
CHIP: The presence of somatic mutations in hematopoietic stem cells in an individual without a detectable hematologic cancer. The definition of CHIP requires that mutations are present with a variant allele frequency of 2% or higher and they are located in genes described to be affected in hematologic cancers. This condition is more common in older individuals and in those who have received treatment for other cancers. It is associated with both an increased risk of developing cardiovascular disease and hematologic cancers. Also called clonal hematopoiesis of indeterminate potential.
chromosomal instability: A genomic imbalance that occurs when a cell has an abnormal number of chromosomes. This can be caused by unexpected chromosomal crossover or by the presence of small, extra-chromosomal pieces of DNA.
chromosome: A structure found inside the nucleus of a cell. A chromosome is made up of proteins and DNA organized into genes. Each cell normally contains 23 pairs of chromosomes.
  More Information
  - Chromosome (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Chromosome)
clinical utility: A term that refers to the likelihood that a test will, by prompting an intervention, result in an improved health outcome. The clinical utility of a genetic test is based on the health benefits related to the interventions offered to individuals with positive test results.
clinical validity: A term that refers to the predictive value of a test for a given clinical outcome (e.g., the likelihood that cancer will develop in someone with a positive test). Clinical validity is primarily determined by the sensitivity and specificity with which a test identifies individuals with a defined clinical condition within a given population. The clinical validity of a genetic test is the likelihood that cancer will develop in someone with a positive test result.
clonal hematopoiesis of indeterminate potential: The presence of somatic mutations in hematopoietic stem cells in an individual without a detectable hematologic cancer. The definition of clonal hematopoiesis of indeterminate potential requires that mutations are present with a variant allele frequency of 2% or higher and they are located in genes described to be affected in hematologic cancers. This condition is more common in older individuals and in those who have received treatment for other cancers. It is associated with both an increased risk of developing cardiovascular disease and hematologic cancers. Also called CHIP.
clone: An identical copy of a DNA sequence or entire gene; one or more cells derived from and identical to a single ancestor cell OR to isolate a gene or specific sequence of DNA.
CNV: A variation in the number of copies of a particular sequence of DNA present in the genome of an individual. CNVs include insertions, deletions, and duplications of segments of DNA. They account for a significant number of the genetic variations between individuals. CNVs may also be associated with specific traits or disorders. Also called copy number variant.
  More Information
  - Copy Number Variation (CNV) (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=40)
codon: A sequence of three consecutive nucleotides in a DNA or RNA molecule that codes for a specific amino acid. Certain codons signal the start or end of translation. These are called start or stop (or termination) codons.
  More Information
  - Codon (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=36)
compound heterozygosity: The presence of two different mutated alleles at a particular gene locus.
conformation-sensitive gel electrophoresis: A type of mutation testing in which a segment of DNA is screened for mismatched pairing between normal and mutated base pairs. Also called CSGE.
congenital: Describes a condition or trait that is present at birth. Congenital conditions may be caused by genetic factors, non-genetic factors, or a combination of both.
  More Information
  - Congenital (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Congenital)
consanguinity: Genetic relatedness between individuals who are descendants of at least one common ancestor.
consent process: A process of information exchange between a clinician and an individual or their legal proxy designed to facilitate autonomous, informed decision making. The informed consent process for genetic testing should include an explanation of the medical and psychosocial risks, benefits, limitations, and potential implications of genetic analysis, a discussion of privacy, confidentiality, the documentation and handling of genetic test results, as well as options for managing the hereditary disease risk. Also called informed consent.
constitutional DNA: Constitutional DNA refers to tissue derived from reproductive cells (egg or sperm) that become incorporated into the DNA of every cell in the body of the offspring. A germline mutation may be passed from parent to offspring. Also called germline DNA.
consultand: An individual who presents for genetic counseling.
copy number variant: A variation in the number of copies of a particular sequence of DNA present in the genome of an individual. Copy number variants include insertions, deletions, and duplications of segments of DNA. They account for a significant number of the genetic variations between individuals. Copy number variants may also be associated with specific traits or disorders. Also called CNV.
  More Information
  - Copy Number Variation (CNV) (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=40)
cosegregation: The transmission, together, of 2 or more genes on the same chromosome, as a result of their being in very close physical proximity to one another (i.e., linked).
counselee: An individual who presents for genetic counseling. Also called consultand.
Crohn disease-like reaction: Discrete aggregates of lymphoid white blood cells, some with germinal centers and surrounding fibrosis, commonly found around some colorectal adenocarcinomas in the absence of a clinical or pathological diagnosis of Crohn disease. Also called Crohn-like reaction.
Crohn-like reaction: Discrete aggregates of lymphoid white blood cells, some with germinal centers and surrounding fibrosis, commonly found around some colorectal adenocarcinomas in the absence of a clinical or pathological diagnosis of Crohn disease. Also called Crohn disease-like reaction.
CSGE: A type of mutation testing in which a segment of DNA is screened for mismatched pairing between normal and mutated base pairs. Also called conformation-sensitive gel electrophoresis.
cutaneous leiomyoma: A benign tumor that arises from smooth muscle tissue in a hair follicle, forming a papule. Cutaneous leiomyomas (or leiomyomata) can be painful in the presence of cold or tactile stimuli.
cutaneous lichen amyloidosis: Itchy papules that are brownish-red in color and typically appear on the shins, thighs, feet, or neck.
cytogenetics: The study of the structure, function, and abnormalities of human chromosomes.
  More Information
  - Cytogenetics (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Cytogenetics)
de novo mutation: A genetic alteration that is present for the first time in one family member as a result of a variant (or mutation) in a germ cell (egg or sperm) of one of the parents, or a variant that arises in the fertilized egg itself during early embryogenesis. Also called de novo variant, new mutation, and new variant.
de novo variant: A genetic alteration that is present for the first time in one family member as a result of a variant (or mutation) in a germ cell (egg or sperm) of one of the parents, or a variant that arises in the fertilized egg itself during early embryogenesis. Also called de novo mutation, new mutation, and new variant.
deleterious mutation: A genetic alteration that increases an individual’s susceptibility or predisposition to a certain disease or disorder. When such a variant (or mutation) is inherited, development of symptoms is more likely, but not certain. Also called disease-causing mutation, pathogenic variant, predisposing mutation, and susceptibility gene mutation.
deletion: A type of genetic change that involves the absence of a segment of DNA. It may be as small as a single base but can vary significantly in size.
  More Information
  - Deletion (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=45)
deoxyribonucleic acid: The molecule inside cells that contains the genetic information responsible for the development and function of an organism. DNA molecules allow this information to be passed from one generation to the next. DNA is made up of a double-stranded helix held together by weak hydrogen bonds between purine-pyrimidine nucleotide base pairs: adenine (A) paired with thymine (T), and guanine (G) paired with cytosine (C). Also called DNA.
  More Information
  - Deoxyribonucleic Acid (DNA) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Deoxyribonucleic-Acid)
  - What is DNA? (MedlinePlus) (https://medlineplus.gov/genetics/understanding/basics/dna/)
depth of coverage: Refers to the number of times a nucleotide is read during sequencing. A greater depth of coverage can increase confidence in the final results. Deep coverage aids in differentiating sequencing errors from single nucleotide polymorphisms. This can be specifically useful when a patient has a mosaicism or when a tumor is heterogeneous for a mutation.
dirty necrosis: Presence of necrotic cellular debris within the lumen of the neoplastic glands in the colorectal mucosa.
disease-causing mutation: A genetic alteration that increases an individual’s susceptibility or predisposition to a certain disease or disorder. When such a variant (or mutation) is inherited, development of symptoms is more likely, but not certain. Also called deleterious mutation, pathogenic variant, predisposing mutation, and susceptibility gene mutation.
DNA: The molecule inside cells that contains the genetic information responsible for the development and function of an organism. DNA molecules allow this information to be passed from one generation to the next. DNA is made up of a double-stranded helix held together by weak hydrogen bonds between purine-pyrimidine nucleotide base pairs: adenine (A) paired with thymine (T), and guanine (G) paired with cytosine (C). Also called deoxyribonucleic acid.
  More Information
  - Deoxyribonucleic Acid (DNA) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Deoxyribonucleic-Acid)
  - What is DNA? (MedlinePlus) (https://medlineplus.gov/genetics/understanding/basics/dna/)
domain: A specific physical region or amino acid sequence in a protein that is associated with a particular function or corresponding segment of DNA.
double heterozygosity: The presence of two different mutated alleles at two separate genetic loci.
D’Amico criteria: A set of clinical criteria that is used to stratify prostate cancers into three risk categories to estimate cancer growth and spread. The criteria include Gleason score, prostate-specific antigen level, and clinical stage at diagnosis.
epigenetic alteration: A heritable change that does not affect the DNA sequence but results in a change in gene expression. Examples include promoter methylation and histone modifications. Also called epigenetic variant and epimutation.
epigenetic variant: A heritable change that does not affect the DNA sequence but results in a change in gene expression. Examples include promoter methylation and histone modifications. Also called epigenetic alteration and epimutation.
epigenetics: The study of heritable changes that do not affect the DNA sequence but influence gene expression.
  More Information
  - Epigenetics (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=528)
epimutation: A heritable change that does not affect the DNA sequence but results in a change in gene expression. Examples include promoter methylation and histone modifications. Also called epigenetic alteration and epigenetic variant.
ER-negative PR-negative HER2/neu-negative breast cancer: ER-negative PR-negative HER2/neu-negative breast cancer is defined by a lack of expression of estrogen receptor (ER), progesterone receptor (PR), and human epidermal growth factor receptor 2 (HER2/neu). Also called TNBC and triple-negative breast cancer.
exon: The sequence of DNA that is present in the final, mature messenger RNA transcript. Most exons code for amino acids, which link together to form a protein. Most genes are made up of many exons with introns in between them.
  More Information
  - Exon (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=61)
facies: A distinctive facial feature or expression that is characteristic of a specific condition.
false-positive result: A test result that indicates an individual is affected and/or has a certain gene mutation when he or she is actually unaffected and/or does not have the mutation; i.e., a positive test result in a truly unaffected or mutation-negative individual.
familial: Having to do with a phenotype or trait that occurs with greater frequency in a given family than in the general population. Familial traits may be related to shared genetic factors and/or shared lifestyle or environmental factors.
family cancer syndrome: A type of inherited disorder in which there is a higher-than-normal risk of certain types of cancer. Family cancer syndromes are caused by inherited genetic variants and may be associated with several clinical manifestations. Examples of family cancer syndromes include Lynch syndrome and hereditary breast and ovarian cancer syndrome. Also called hereditary cancer syndrome and inherited cancer syndrome.
  More Information
  - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
FDR: A parent, sibling, or child of an individual. Also called first-degree relative.
  More Information
  - First Degree Relative (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/First-Degree-Relative)
fibrofolliculoma: A benign tumor of the hair follicle that appears as a small, whitish papule. Fibrofolliculomas are typically found on the face, ears, neck, and upper torso. They are pathognomonic for Birt-Hogg-Dubé syndrome, a hereditary condition associated with the development of kidney cancer.
first-degree relative: A parent, sibling, or child of an individual. Also called FDR.
  More Information
  - First Degree Relative (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/First-Degree-Relative)
FISH: A technique used to identify the presence of specific chromosomes or chromosomal regions through hybridization (attachment) of fluorescently-labeled DNA probes to denatured chromosomal DNA. Examination through a microscope under fluorescent lighting detects the presence or absence of the colored hybridized signal, hence the presence or absence of the chromosome material. Also called fluorescence in situ hybridization.
  More Information
  - Fluorescence In Situ Hybridization (FISH) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Fluorescence-In-Situ-Hybridization)
fluorescence in situ hybridization: A technique used to identify the presence of specific chromosomes or chromosomal regions through hybridization (attachment) of fluorescently-labeled DNA probes to denatured chromosomal DNA. Examination through a microscope under fluorescent lighting detects the presence or absence of the colored hybridized signal, hence the presence or absence of the chromosome material. Also called FISH.
  More Information
  - Fluorescence In Situ Hybridization (FISH) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Fluorescence-In-Situ-Hybridization)
founder mutation: A genetic alteration observed with high frequency in a group that is or was geographically or culturally isolated, in which one or more of the ancestors was a carrier of the altered gene. This phenomenon is often called a founder effect. Also called founder variant.
founder variant: A genetic alteration observed with high frequency in a group that is or was geographically or culturally isolated, in which one or more of the ancestors was a carrier of the altered gene. This phenomenon is often called a founder effect. Also called founder mutation.
frameshift mutation: An insertion or deletion involving a number of base pairs that is not a multiple of three, which consequently disrupts the triplet reading frame of a DNA sequence. Such variants (or mutations) usually lead to the creation of a premature termination (stop) codon, and result in a truncated (shorter-than-normal) protein product. Also called frameshift variant.
  More Information
  - Frameshift Mutation (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=68)
frameshift variant: An insertion or deletion involving a number of base pairs that is not a multiple of three, which consequently disrupts the triplet reading frame of a DNA sequence. Such variants (or mutations) usually lead to the creation of a premature termination (stop) codon, and result in a truncated (shorter-than-normal) protein product. Also called frameshift mutation.
  More Information
  - Frameshift Mutation (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=68)
gene: The basic unit of heredity passed from parent to child. Genes are made up of sequences of DNA and are arranged, one after another, at specific locations on chromosomes in the nucleus of cells. They contain information for making specific proteins that lead to the expression of a particular physical characteristic or trait, such as hair color or eye color, or to a particular function in a cell.
  More Information
  - Gene (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Gene)
  - The Genetics of Cancer (https://www.cancer.gov/about-cancer/causes-prevention/genetics)
genetic anticipation: A phenomenon in which the signs and symptoms of some genetic conditions tend to become more severe and/or appear at an earlier age as the condition is passed from one generation to the next.
genetic counseling: A communication process that seeks to assist affected or at-risk individuals and families in understanding the natural history, disease risks, and mode of transmission of a genetic disorder; to facilitate informed consent for genetic testing when appropriate; to discuss options for risk management and family planning; and to provide for or refer individuals for psychosocial support as needed.
  More Information
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
  - Genetic Counseling (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Genetic-Counseling)
genetic heterogeneity: A term used to describe different genetic mechanisms that produce the same or similar phenotypes. There are two types of genetic heterogeneity: allelic heterogeneity and locus heterogeneity. Allelic heterogeneity occurs when different variants at a single gene locus cause the same or similar phenotypic expressions of a disease or condition. Locus heterogeneity occurs when variants at different gene loci cause the same or similar phenotypic expressions of a disease or condition.
genetic marker: A sequence of DNA with a known physical location on a chromosome. Genetic markers and genes that are close to each other on a chromosome tend to be inherited together. Genetic markers vary between individuals to the extent that they can be used to help find a nearby gene causing a certain disease or trait within a family. Examples of genetic markers are single polymorphism nucleotides (SNPs), restriction fragment length polymorphisms (RFLPs), variable number of tandem repeats (VNTRs), microsatellites, and copy number variants (CNVs). Genetic markers may or may not have a known function.
  More Information
  - Genetic Marker (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Genetic-Marker)
genetic predisposition: An increased chance or likelihood of developing a particular disease based on the presence of one or more genetic variants and/or a family history suggestive of an increased risk of the disease. Having a genetic predisposition does not mean an individual will develop the disease. Lifestyle and environmental factors can also affect an individual's risk of disease. Also called genetic susceptibility, hereditary predisposition, and inherited predisposition.
  More Information
  - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
genetic screening: The process of testing individuals in a given population to identify those who have an increased risk of having or developing a particular genetic disorder or carrying a genetic variant for a particular disorder.
  More Information
  - Genetic Screening (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=87)
genetic susceptibility: An increased chance or likelihood of developing a particular disease based on the presence of one or more genetic variants and/or a family history suggestive of an increased risk of the disease. Having a genetic susceptibility does not mean an individual will develop the disease. Lifestyle and environmental factors can also affect an individual's risk of disease. Also called genetic predisposition, hereditary predisposition, and inherited predisposition.
  More Information
  - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
genodermatosis: An inherited syndrome that includes a dermatological (skin) phenotype.
genome-wide association study: A method used to identify inherited genetic variants associated with risk for a particular disease or trait. A genome-wide association study looks at the entire genome for genetic variants, usually single nucleotide polymorphisms (SNPs), that tend to occur more often in individuals with the disease or trait being studied than in those without the disease or trait. Also called GWAS.
  More Information
  - Genome-Wide Association Studies (GWAS) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Genome-Wide-Association-Studies)
genomic imprinting: An epigenetic process resulting in the inactivation of an allele depending on which parent it was inherited from. Genomic imprinting can have clinical relevance because it may affect the expression of a gene mutation (i.e., the phenotype) in the offspring of an affected parent depending on which parent is passing on the mutation.
genotype: A term that refers to the two alleles present at a specific locus in the genome. Genotype also refers to the entire genetic makeup of an individual.
  More Information
  - Genotype (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=93)
genotyping: A laboratory process in which an individual’s germline DNA is analyzed for specific nucleotides or bases to determine whether certain variants are present. Genotyping differs from sequencing in which all of the nucleotides comprising a specific length of DNA are assessed (e.g., within a gene, exome, or genome).
germline: The cells from which eggs or sperm (i.e., gametes) are derived.
germline DNA: Germline DNA refers to tissue derived from reproductive cells (egg or sperm) that become incorporated into the DNA of every cell in the body of the offspring. A germline mutation may be passed from parent to offspring. Also called constitutional DNA.
germline mosaicism: A term that refers to the presence of a pathogenic variant that is confined to the ovaries or testes. Germline mosaicism occurs when some of the sperm cells in the testes or some of the egg cells in the ovaries carry a pathogenic variant that is not found in other cells of the body. This means that a parent may not develop a genetic condition but could pass it on to one or more of their children. Also called gonadal mosaicism.
germline mutation: A mutation in a reproductive cell (egg or sperm) that is in the DNA of every cell in the offspring's body. A mutation contained within the germline can be passed from parent to offspring and is, therefore, hereditary. Also called germline variant.
germline variant: A variant in a reproductive cell (egg or sperm) that is in the DNA of every cell in the offspring's body. A variant contained within the germline can be passed from parent to offspring and is, therefore, hereditary. Also called germline mutation.
gonadal mosaicism: A term that refers to the presence of a pathogenic variant that is confined to the ovaries or testes. Gonadal mosaicism occurs when some of the sperm cells in the testes or some of the egg cells in the ovaries carry a pathogenic variant that is not found in other cells of the body. This means that a parent may not develop a genetic condition but could pass it on to one or more of their children. Also called germline mosaicism.
GWAS: A method used to identify inherited genetic variants associated with risk for a particular disease or trait. A GWAS looks at the entire genome for genetic variants, usually single nucleotide polymorphisms (SNPs), that tend to occur more often in individuals with the disease or trait being studied than in those without the disease or trait. Also called genome-wide association study.
  More Information
  - Genome-Wide Association Studies (GWAS) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Genome-Wide-Association-Studies)
haploinsufficiency: The situation that occurs when one copy of a gene is inactivated or deleted and the remaining functional copy of the gene is not adequate to produce the needed gene product to preserve normal function.
haplotype: A set of closely linked genetic markers or DNA variations on a chromosome that tend to be inherited together.
  More Information
  - Haplotype (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=99)
hemizygous: Describes an individual who has only one member of a chromosome pair or chromosome segment rather than the usual two. Hemizygosity is often used to describe X-linked genes in males who have only one X chromosome. This term is sometimes used in somatic cell genetics where cancer cell lines are often hemizygous for certain alleles or chromosomal regions.
hereditary cancer syndrome: A type of inherited disorder in which there is a higher-than-normal risk of certain types of cancer. Hereditary cancer syndromes are caused by inherited genetic variants and may be associated with several clinical manifestations. Examples of hereditary cancer syndromes include Lynch syndrome and hereditary breast and ovarian cancer syndrome. Also called family cancer syndrome and inherited cancer syndrome.
  More Information
  - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
hereditary predisposition: An increased chance or likelihood of developing a particular disease based on the presence of one or more genetic variants and/or a family history suggestive of an increased risk of the disease. Having a hereditary predisposition does not mean an individual will develop the disease. Lifestyle and environmental factors can also affect an individual's risk of disease. Also called genetic predisposition, genetic susceptibility, and inherited predisposition.
  More Information
  - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
heritability: The proportion of variation in a population trait that can be attributed to inherited genetic factors. Heritability estimates range from 0 to 1 and are often expressed as a percentage. A number close to 1 may be indicative of a highly heritable trait within a population. It should not be used to estimate risk on an individual basis.
heteroduplex analysis: A laboratory method used to detect sequence differences between normal DNA and the DNA to be tested. Heteroduplex analysis is commonly used to screen for point variants (mutations) in a gene but does not identify the exact location of the variant.
heterogeneity logarithm of the odds score: A statistical estimate of whether two genetic loci are physically near enough to each other (or “linked”) on a particular chromosome that they are likely to be inherited together. A heterogeneity logarithm of the odds score is calculated in the presence of locus heterogeneity (when the same phenotype can be caused by mutations in genes at different chromosomal loci). Also called HLOD score.
heterozygous genotype: The presence of two different alleles at a particular gene locus. A heterozygous genotype may include one normal allele and one mutated allele or two different mutated alleles (compound heterozygote).
  More Information
  - Heterozygous (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=101)
HLOD score: A statistical estimate of whether two genetic loci are physically near enough to each other (or “linked”) on a particular chromosome that they are likely to be inherited together. An HLOD score is calculated in the presence of locus heterogeneity (when the same phenotype can be caused by mutations in genes at different chromosomal loci). Also called heterogeneity logarithm of the odds score.
homozygous genotype: The presence of two identical alleles at a particular gene locus. A homozygous genotype may include two normal alleles or two alleles that have the same variant.
  More Information
  - Homozygous (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=105)
hypomelanosis: Deficiency of melanin.
incomplete penetrance: Penetrance refers to the likelihood that a clinical condition will occur when a particular genotype is present. A condition is said to show incomplete penetrance when some individuals who carry the pathogenic variant express the associated trait while others do not. Also called reduced penetrance.
inconclusive result: A negative test result in an individual where a clearly deleterious mutation has not been found in any family members. The genetic risk status of such an individual must be interpreted in the context of his or her personal and family history. Also called indeterminate result and uninformative result.
indeterminate result: A negative test result in an individual where a clearly deleterious mutation has not been found in any family members. The genetic risk status of such an individual must be interpreted in the context of his or her personal and family history. Also called inconclusive result and uninformative result.
index case: A clinically affected individual through whom attention is first drawn to a genetic disorder in a family.
informative: In genetic testing, a test result that reveals definitively the presence or absence of the germline genetic alteration associated with the hereditary disorder being assessed. In linkage analysis, the ability to distinguish between maternally inherited and paternally inherited DNA markers (polymorphisms) within or near a given gene of interest.
informed consent: A process of information exchange between a clinician and an individual or their legal proxy designed to facilitate autonomous, informed decision making. The informed consent process for genetic testing should include an explanation of the medical and psychosocial risks, benefits, limitations, and potential implications of genetic analysis, a discussion of privacy, confidentiality, the documentation and handling of genetic test results, as well as options for managing the hereditary disease risk. Also called consent process.
inherited cancer syndrome: A type of inherited disorder in which there is a higher-than-normal risk of certain types of cancer. Inherited cancer syndromes are caused by inherited genetic variants and may be associated with several clinical manifestations. Examples of inherited cancer syndromes include Lynch syndrome and hereditary breast and ovarian cancer syndrome. Also called family cancer syndrome and hereditary cancer syndrome.
  More Information
  - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
inherited predisposition: An increased chance or likelihood of developing a particular disease based on the presence of one or more genetic variants and/or a family history suggestive of an increased risk of the disease. Having an inherited predisposition does not mean an individual will develop the disease. Lifestyle and environmental factors can also affect an individual's risk of disease. Also called genetic predisposition, genetic susceptibility, and hereditary predisposition.
  More Information
  - Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
insertion: A type of genetic change that involves the addition of a segment of DNA. It may be as small as a single base but can vary significantly in size.
  More Information
  - Insertion (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Insertion)
intron: The sequence of DNA in between exons that is initially copied into RNA, but is cut out of the final, mature messenger RNA transcript. Introns do not code for amino acids that make up the protein encoded by the gene.
  More Information
  - Intron (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=113)
inversion: A chromosomal defect in which a segment of the chromosome breaks off and reattaches in the reverse direction.
kindred: An extended family.
late or variable onset: Refers to the age at which a disease phenotype is expressed in an individual who carries a pathogenic variant. Conditions with late or variable onset generally manifest later in life or at no fixed time over the course of a lifetime.
LD: Where alleles (DNA markers) occur together more often than can be accounted for by chance because of their physical proximity on a chromosome. Also called linkage disequilibrium.
linkage: The tendency for genes or other segments of DNA to be inherited together during meiosis because of their location near one another on the same chromosome. Finding linked genes can help identify a disease-causing gene.
  More Information
  - Linkage (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=115)
linkage analysis: A gene-hunting technique that traces patterns of disease in high-risk families. Linkage analysis attempts to locate a disease-causing gene by identifying genetic markers of known chromosomal location that are co-inherited with the gene or trait of interest.
linkage disequilibrium: Where alleles (DNA markers) occur together more often than can be accounted for by chance because of their physical proximity on a chromosome. Also called LD.
locus: The physical location of a specific gene on a chromosome.
  More Information
  - Locus (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Locus)
locus heterogeneity: The presence of variants at different gene loci that cause the same or similar phenotypic expressions of a disease or condition.
LOD score: A statistical estimate of whether two genetic loci are physically near enough to each other (or "linked") on a particular chromosome that they are likely to be inherited together. A LOD score of 3 or higher is generally understood to mean that two genes are located close to each other on the chromosome. In terms of significance, a LOD score of 3 means the odds are 1,000:1 that the two genes are linked and therefore inherited together. Also called logarithm of the odds score.
  More Information
  - LOD Score (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=531)
logarithm of the odds score: A statistical estimate of whether two genetic loci are physically near enough to each other (or "linked") on a particular chromosome that they are likely to be inherited together. A logarithm of the odds score of 3 or higher is generally understood to mean that two genes are located close to each other on the chromosome. In terms of significance, a logarithm of the odds score of 3 means the odds are 1,000:1 that the two genes are linked and therefore inherited together. Also called LOD score.
  More Information
  - LOD Score (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=531)
LOH: If there is one normal and one abnormal allele at a particular locus, as might be seen in an inherited autosomal dominant cancer susceptibility disorder, loss of the normal allele produces a locus with no normal function. When the loss of heterozygosity involves the normal allele, it creates a cell that is more likely to show malignant growth if the altered gene is a tumor suppressor gene. Also called loss of heterozygosity.
loss of heterozygosity: If there is one normal and one abnormal allele at a particular locus, as might be seen in an inherited autosomal dominant cancer susceptibility disorder, loss of the normal allele produces a locus with no normal function. When the loss of heterozygosity involves the normal allele, it creates a cell that is more likely to show malignant growth if the altered gene is a tumor suppressor gene. Also called LOH.
massively parallel sequencing: A high-throughput method used to determine a portion of the nucleotide sequence of an individual’s genome. This technique utilizes DNA sequencing technologies that are capable of processing multiple DNA sequences in parallel. Also called next-generation sequencing and NGS.
melanocytic macules associated with Peutz-Jeghers syndrome: Benign pigmented patches that are commonly found on the lips. They may also be found inside the mouth, on the fingers, or on the genitalia. Melanocytic macules are a characteristic feature of Peutz-Jeghers syndrome, which is a hereditary syndrome associated with several types of cancer.
metachronous cancer: A term used to describe a new or second primary cancer that develops months or years after a first primary cancer, either in the same organ or in a different organ.
MGPT: Genetic tests that use next-generation sequencing to test multiple genes simultaneously. Also called multigene panel test and multigene test.
  More Information
  - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
microsatellite: Repetitive segments of DNA scattered throughout the genome in noncoding regions between genes or within genes (introns). Microsatellites are often used as markers for linkage analysis because of their naturally occurring high variability in repeat number between individuals. These regions are inherently genetically unstable and susceptible to mutations.
  More Information
  - Microsatellite (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Microsatellite)
microsatellite instability: A characteristic of cells that contain an abnormality in DNA mismatch repair. The presence of microsatellite instability can be a marker of a germline pathogenic variant in one of the DNA mismatch repair genes, as in the case of Lynch syndrome. Microsatellite instability can also occur sporadically. Also called MSI.
missense mutation: A genetic alteration in which a single base pair substitution alters the genetic code in a way that produces an amino acid that is different from the usual amino acid at that position. Some missense variants (or mutations) will alter the function of the protein. Also called missense variant.
  More Information
  - Missense Mutation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Missense-Mutation)
missense variant: A genetic alteration in which a single base pair substitution alters the genetic code in a way that produces an amino acid that is different from the usual amino acid at that position. Some missense variants (or mutations) will alter the function of the protein. Also called missense mutation.
  More Information
  - Missense Mutation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Missense-Mutation)
MLPA: A laboratory method commonly used for the detection of unusual copy number changes (insertions or deletions) of genomic sequences. Also called multiplex ligation-dependent probe amplification.
mode of inheritance: The manner in which a genetic trait, disorder, or risk of disorder is passed from one generation to the next. There are different modes of inheritance, and each mode of inheritance may result in a characteristic pattern of affected, unaffected, or at-risk individuals within a family. Examples are autosomal dominant, autosomal recessive, X-linked dominant, X-linked recessive, and multifactorial inheritance.
mosaicism: The occurrence of 2 or more cell lines with different genetic or chromosomal make-up, within a single individual or tissue.
  More Information
  - Mosaicism (MedlinePlus) (https://medlineplus.gov/ency/article/001317.htm)
MSI: A characteristic of cells that contain an abnormality in DNA mismatch repair. The presence of MSI can be a marker of a germline pathogenic variant in one of the DNA mismatch repair genes, as in the case of Lynch syndrome. MSI can also occur sporadically. Also called microsatellite instability.
mucosal neuroma: A benign tumor of nerve tissue commonly found on the tongue, lips, or in the gastrointestinal tract. Mucosal neuromas are a characteristic feature of multiple endocrine neoplasia type 2B (also known as MEN3), which is a hereditary syndrome associated with the development of medullary thyroid cancer.
multigene panel test: Genetic tests that use next-generation sequencing to test multiple genes simultaneously. Also called MGPT and multigene test.
  More Information
  - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
multigene panel test: Genetic tests that use next-generation sequencing to test multiple genes simultaneously. Also called MGPT, multigene test, and panel test.
  More Information
  - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
multigene test: Genetic tests that use next-generation sequencing to test multiple genes simultaneously. Also called MGPT and multigene panel test.
  More Information
  - Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment)
  - Cancer Genetics Risk Assessment and Counseling (Health Professional Version) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/risk-assessment-pdq)
multiplex genomic test: A method for detecting multiple genetic alterations (i.e., gene mutations or single nucleotide polymorphisms in a single gene or across the genome) simultaneously.
multiplex ligation-dependent probe amplification: A laboratory method commonly used for the detection of unusual copy number changes (insertions or deletions) of genomic sequences. Also called MLPA.
mutation: A change in the usual DNA sequence at a particular gene locus. Although the term often has a negative connotation, mutations (including polymorphisms) can be harmful, beneficial, or neutral in their effect on cell function. The term variant is sometimes used as a synonym for the term mutation.
  More Information
  - Mutation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Mutation)
mutation analysis: A germline genetic testing method targeted to detect a specific variant or mutation (such as a deleterious MSH2 variant previously identified in a family), panel of variants (such as the 3 BRCA pathogenic variants comprising the founder mutation panel for individuals of Ashkenazi Jewish ancestry) or type of variant (such as large deletions or insertions in the BRCA1 gene). This type of testing is distinct from complete gene sequencing or variant scanning. The latter are designed to detect most variants in the region being tested. Current usage also applies this term to any genetic test.
nail dystrophy: Distortion or malformation of the fingernails and toenails. Also called onychodystrophy.
negative predictive value: The likelihood that an individual with a negative test result is truly unaffected and/or does not have the particular gene mutation in question. Also called NPV.
new mutation: A genetic alteration that is present for the first time in one family member as a result of a variant (or mutation) in a germ cell (egg or sperm) of one of the parents, or a variant that arises in the fertilized egg itself during early embryogenesis. Also called de novo mutation, de novo variant, and new variant.
new variant: A genetic alteration that is present for the first time in one family member as a result of a variant (or mutation) in a germ cell (egg or sperm) of one of the parents, or a variant that arises in the fertilized egg itself during early embryogenesis. Also called de novo mutation, de novo variant, and new mutation.
next-generation sequencing: A high-throughput method used to determine a portion of the nucleotide sequence of an individual’s genome. This technique utilizes DNA sequencing technologies that are capable of processing multiple DNA sequences in parallel. Also called massively parallel sequencing and NGS.
NGS: A high-throughput method used to determine a portion of the nucleotide sequence of an individual’s genome. This technique utilizes DNA sequencing technologies that are capable of processing multiple DNA sequences in parallel. Also called massively parallel sequencing and next-generation sequencing.
noncarrier: An individual who does not carry a mutation previously identified in his or her family.
noninferiority study: A research study that is designed to determine whether one intervention is not worse than another control intervention by a predetermined margin. An intervention that yields outcomes which are equivalent to or better than the control intervention is considered not inferior to the control intervention. Noninferiority studies are often conducted to examine whether a new, experimental treatment is not worse than an established standard of care.
nonpenetrance: An instance in which an individual has a trait-associated or disease-causing genetic variant, but the individual does not have the phenotype or condition. An example of nonpenetrance is a woman with a BRCA1 pathogenic variant who lives to be elderly and never develops breast or ovarian cancer.
nonsense mutation: A genetic alteration that causes the premature termination of a protein. The altered protein may be partially or completely inactivated, resulting in a change or loss of protein function. Also called nonsense variant.
  More Information
  - Nonsense Mutation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Nonsense-Mutation)
nonsense variant: A genetic alteration that causes the premature termination of a protein. The altered protein may be partially or completely inactivated, resulting in a change or loss of protein function. Also called nonsense mutation.
  More Information
  - Nonsense Mutation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Nonsense-Mutation)
novel mutation: A newly discovered, distinct genetic alteration; NOT the same as new or de novo variant (or mutation). Also called novel variant.
novel variant: A newly discovered, distinct genetic alteration; NOT the same as new or de novo variant (or mutation). Also called novel mutation.
NPV: The likelihood that an individual with a negative test result is truly unaffected and/or does not have the particular gene mutation in question. Also called negative predictive value.
nucleotide: A molecule that is the basic building block of the nucleic acids DNA and RNA. A nucleotide is made up of a nitrogen-containing base (adenine, guanine, thymine, and cytosine in DNA, and adenine, guanine, uracil, and cytosine in RNA), a phosphate group, and a sugar molecule (deoxyribose in DNA, and ribose in RNA). DNA and RNA are polymers made up of many nucleotides.
  More Information
  - Nucleotide (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Nucleotide)
null allele: A DNA sequence variation that results in no gene product. The gene product (RNA or protein) of a null allele is either absent or not detectable at the molecular level or does not function at the phenotypic level.
onychodystrophy: Distortion or malformation of the fingernails and toenails. Also called nail dystrophy.
oral papilloma: A benign growth of epithelial cells in the mouth or on the lips. This condition is associated with Cowden syndrome, which is a hereditary syndrome associated with the development of several types of cancer.
palmar pit: A small depression in the skin on the palm of the hand. Depressions may also be seen on the sole of the foot (plantar pits). They are usually pink or flesh-colored and range from 2 to 3 mm in diameter and 1 to 3 mm in depth. Palmar pits are often more visible after a brief soaking of the hands or feet. This condition is associated with basal cell nevus syndrome, which is a hereditary syndrome associated with the development of basal cell carcinoma.
pathogenic variant: A genetic alteration that increases an individual’s susceptibility or predisposition to a certain disease or disorder. When such a variant (or mutation) is inherited, development of symptoms is more likely, but not certain. Also called deleterious mutation, disease-causing mutation, predisposing mutation, and susceptibility gene mutation.
pathognomonic: Findings that are distinctive or characteristic of a particular disease or condition and can be used to make a diagnosis.
PCR: A common laboratory technique used during molecular genetic testing to produce many copies of a specific sequence of DNA . PCR allows these DNA sequences to be amplified so there is a sufficient quantity of DNA to be analyzed by molecular genetic tests. Also called polymerase chain reaction.
  More Information
  - Polymerase Chain Reaction (PCR) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Polymerase-Chain-Reaction)
pedigree: A diagram of family history that uses standardized symbols. A pedigree shows relationships between family members and indicates which individuals have certain genetic pathogenic variants, traits, and diseases within a family as well as vital status. A pedigree can be used to determine disease inheritance patterns within a family.
penetrance: Penetrance refers to the likelihood that a clinical condition will occur when a particular genotype is present. For adult-onset diseases, penetrance is usually described by the individual carrier's age, sex, and organ site. For example, the penetrance for breast cancer in female carriers of BRCA1 pathogenic variants is often quoted by age 50 years and by age 70 years.
phenocopy: A phenotypic trait or disease that resembles the trait expressed by a particular genotype but in an individual who is not a carrier of that genotype.
phenotype: The observable characteristics or traits in an individual based on the expression of their genes. The phenotype is determined by the individual's genotype and possibly influenced by other factors, such as environmental factors or other genetic modifiers.
  More Information
  - Phenotype (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=152)
plantar pit: A small depression in the skin on the sole of the foot. Depressions may also be seen on the palm of the hand (palmar pits). They are usually pink or flesh-colored and range from 2 to 3 mm in diameter and 1 to 3 mm in depth. Plantar pits are often more visible after a brief soaking of the hands or feet. This condition is associated with basal cell nevus syndrome, which is a hereditary syndrome associated with the development of basal cell carcinoma.
poikiloderma: Irregular patterns of reddish brown pigmentation of the skin associated with sun exposure, aging, or a genetic cause.
point mutation: A genetic alteration caused by the substitution of a single nucleotide for another nucleotide. Also called point variant.
  More Information
  - Point Mutation (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=156)
point variant: A genetic alteration caused by the substitution of a single nucleotide for another nucleotide. Also called point mutation.
  More Information
  - Point Mutation (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=156)
polygenic risk score: An assessment of the risk of a specific condition based on the collective influence of many genetic variants. These can include variants associated with genes of known function and variants not known to be associated with genes relevant to the condition. Also called PRS.
polymerase chain reaction: A common laboratory technique used during molecular genetic testing to produce many copies of a specific sequence of DNA . Polymerase chain reaction allows these DNA sequences to be amplified so there is a sufficient quantity of DNA to be analyzed by molecular genetic tests. Also called PCR.
  More Information
  - Polymerase Chain Reaction (PCR) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Polymerase-Chain-Reaction)
polymorphism: A common variant in a specific sequence of DNA. “Common” is typically defined as an allele frequency of at least 1% in the general population.
  More Information
  - Polymorphism (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Polymorphism)
population risk: The proportion of individuals in the general population who are affected with a particular disorder or who carry a certain gene; often discussed in the genetic counseling process as a comparison to the patient’s personal risk given his or her family history or other circumstances.
positive predictive value: The likelihood that an individual with a positive test result truly has the particular gene and/or disease in question. Also called PPV.
PPV: The likelihood that an individual with a positive test result truly has the particular gene and/or disease in question. Also called positive predictive value.
predisposing mutation: A genetic alteration that increases an individual’s susceptibility or predisposition to a certain disease or disorder. When such a variant (or mutation) is inherited, development of symptoms is more likely, but not certain. Also called deleterious mutation, disease-causing mutation, pathogenic variant, and susceptibility gene mutation.
presymptomatic testing: Genetic testing performed in an individual who does not show symptoms of the disorder, but who is at risk of developing the disorder.
proband: The first individual in a family to be identified as possibly having a genetic disorder or condition.
  More Information
  - Proband (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=164)
proposita: The female individual through whom a family with a genetic disorder is ascertained. In males this is called a propositus.
propositus: The male individual through whom a family with a genetic disorder is ascertained. In females this is called a proposita.
PRS: An assessment of the risk of a specific condition based on the collective influence of many genetic variants. These can include variants associated with genes of known function and variants not known to be associated with genes relevant to the condition. Also called polygenic risk score.
pseudogene: A DNA sequence that resembles a gene but has been mutated into an inactive form over the course of evolution. It often lacks introns and other essential DNA sequences necessary for function. Though genetically similar to the original functional gene, pseudogenes do not result in functional proteins, although some may have regulatory effects.
  More Information
  - Pseudogene (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Pseudogene)
recurrence risk: In genetics, the likelihood that a hereditary trait or disorder present in one family member will occur again in other family members. This is distinguished from recurrence risk for cancer, which is the chance that a cancer that has been treated will recur.
reduced penetrance: Penetrance refers to the likelihood that a clinical condition will occur when a particular genotype is present. A condition is said to show incomplete penetrance when some individuals who carry the pathogenic variant express the associated trait while others do not. Also called incomplete penetrance.
risk assessment: The quantitative or qualitative assessment of an individual’s risk of carrying a certain gene mutation, or developing a particular disorder, or of having a child with a certain disorder; sometimes done by using mathematical or statistical models incorporating such factors as personal health history, family medical history and ethnic background.
  More Information
  - Risk Factors for Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk)
RNA splicing: The process by which introns (noncoding regions of genes) are cut out of the primary messenger RNA transcript, and the exons (coding regions of genes) are joined together to make mature messenger RNA. Mature messenger RNA carries the instructions a cell needs for making a specific protein.
Sanger sequencing: A low-throughput laboratory method used to determine the nucleotide sequence of a piece of DNA. Sanger sequencing uses polymerase chain reaction (PCR) to amplify the target DNA region and then sequences the PCR products.
screening: Checking for disease in individuals who have no symptoms. Since screening may find diseases at an early stage, there may be a better chance of curing the disease. Screening may also include genetic testing to check for an individual's risk of developing an inherited disease.
  More Information
  - Cancer Screening (https://www.cancer.gov/about-cancer/screening)
  - PDQ® Cancer Information Summaries: Screening/Detection (Testing for Cancer) (https://www.cancer.gov/publications/pdq/information-summaries/screening)
SDR: An aunt, uncle, grandparent, grandchild, niece, nephew, or half-sibling of an individual. Also called second-degree relative.
sebaceoma: A benign yellow or flesh-colored lesion originating from an oil gland in the skin. Sebaceomas are typically found on the face or neck. They may be associated with Muir-Torre syndrome, which is a hereditary syndrome associated with the development of several types of cancer. Also called sebaceous epithelioma.
sebaceous epithelioma: A benign yellow or flesh-colored lesion originating from an oil gland in the skin. Sebaceous epitheliomas are typically found on the face or neck. They may be associated with Muir-Torre syndrome, which is a hereditary syndrome associated with the development of several types of cancer. Also called sebaceoma.
second-degree relative: An aunt, uncle, grandparent, grandchild, niece, nephew, or half-sibling of an individual. Also called SDR.
segregation analysis: The process of fitting formal genetic models to data on expressed disease characteristics (phenotype) in biological family members in order to determine the most likely mode of inheritance for the trait or disease under study.
sensitivity: The frequency with which a test shows a true positive result among individuals who actually have the disease or the genetic variant in question. A test with high sensitivity has a low false-negative rate, which means it does a good job of correctly identifying affected individuals or carriers of a genetic variant.
simplex case: A single, isolated occurrence of an inherited condition in a family. Simplex cases can result from certain inheritance patterns or be caused by de novo mutations or reduced penetrance within the family. It can also result from nongenetic causes such as adoption or alternate paternity.
single nucleotide polymorphism: A DNA sequence variation that occurs when a single nucleotide (adenine, thymine, cytosine, or guanine) is different from the reference sequence. Single nucleotide polymorphisms are usually present in at least 1% of the population and are the most common type of genetic variation among people. Single nucleotide polymorphisms may increase the risk of developing certain diseases, act as biomarkers to help predict the risk of developing certain diseases or how a person may respond to certain drugs, or be used to track the inheritance of disease-causing variants within families. Also called SNP.
  More Information
  - Single Nucleotide Polymorphisms (SNPs) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Single-Nucleotide-Polymorphisms)
single nucleotide variant: A DNA sequence variation that occurs when a single nucleotide (adenine, thymine, cytosine, or guanine) in the genome sequence is altered. Single nucleotide variants may be rare or common in a population. Sometimes single nucleotide variants are referred to as single nucleotide polymorphisms if they are present in at least 1% of the population. Also called SNV.
single-stranded conformation polymorphism analysis: A laboratory test used to separate single-stranded nucleic acids based on subtle differences in their DNA sequence, often a single base pair, which results in a different secondary structure and a measurable difference in mobiity through a gel. Also called SSCP analysis.
single-stranded conformational polymorphism: A type of mutation scanning; the identification of abnormally-migrating single-stranded DNA segments on gel electrophoresis. Also called SSCP.
sister chromatid exchange: Mitotic crossover between homologous chromosomes.
skin tag: A small, benign skin growth that may have a stalk (peduncle). Skin tags most commonly appear on the neck, axillary, groin, and inframammary regions. Also called acrochordon.
SNP: A DNA sequence variation that occurs when a single nucleotide (adenine, thymine, cytosine, or guanine) is different from the reference sequence. SNPs are usually present in at least 1% of the population and are the most common type of genetic variation among people. SNPs may increase the risk of developing certain diseases, act as biomarkers to help predict the risk of developing certain diseases or how a person may respond to certain drugs, or be used to track the inheritance of disease-causing variants within families. Also called single nucleotide polymorphism.
  More Information
  - Single Nucleotide Polymorphisms (SNPs) (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Single-Nucleotide-Polymorphisms)
SNV: A DNA sequence variation that occurs when a single nucleotide (adenine, thymine, cytosine, or guanine) in the genome sequence is altered. SNVs may be rare or common in a population. Sometimes SNVs are referred to as single nucleotide polymorphisms if they are present in at least 1% of the population. Also called single nucleotide variant.
somatic mutation: In the context of cancer genetics, somatic mutation refers to a mutation in DNA that occurs before or during tumor development. This type of mutation is not present within the germline (sperm and egg). Also called somatic variant.
somatic variant: In the context of cancer genetics, somatic variant refers to a variant in DNA that occurs before or during tumor development. This type of variant is not present within the germline (sperm and egg). Also called somatic mutation.
Southern blot: Electrophoresis-based technique used in genetic testing to detect large deletions in DNA that can be missed by PCR-based genetic testing methods.
  More Information
  - Southern Blot (National Human Genome Research Institute) (https://www.genome.gov/glossary/index.cfm?id=459)
specificity: The frequency with which a test shows a true negative result among individuals who do not have the disease or the genetic variant in question. A test with high specificity has a low false-positive rate, which means it does a good job of correctly identifying unaffected individuals or noncarriers of a genetic variant.
splice-site mutation: A genetic alteration in the DNA sequence that occurs at the boundary of an exon and an intron (splice site). This change can disrupt RNA splicing resulting in the loss of exons or the inclusion of introns and an altered protein-coding sequence. Also called splice-site variant.
splice-site variant: A genetic alteration in the DNA sequence that occurs at the boundary of an exon and an intron (splice site). This change can disrupt RNA splicing resulting in the loss of exons or the inclusion of introns and an altered protein-coding sequence. Also called splice-site mutation.
sporadic cancer: Cancer that occurs in people who do not have an inherited genetic variant that would increase their risk for that cancer. Sporadic cancer is sometimes used to differentiate cancers that occur in these people from cancers that occur in people who are known or likely to carry a high-risk variant that increases their risk for cancer. Sporadic cancer is also sometimes used to describe cancer that occurs in people who do not have a family history of that cancer or other associated cancers.
SSCP: A type of mutation scanning; the identification of abnormally-migrating single-stranded DNA segments on gel electrophoresis. Also called single-stranded conformational polymorphism.
SSCP analysis: A laboratory test used to separate single-stranded nucleic acids based on subtle differences in their DNA sequence, often a single base pair, which results in a different secondary structure and a measurable difference in mobiity through a gel. Also called single-stranded conformation polymorphism analysis.
sumLOD score: The summation of all positive pedigree LOD scores (statistical estimates of whether two genetic loci are physically near enough to each other on a particular chromosome that they are likely to be inherited together) at each point in the genome. Also called summary logarithm of the odds score.
summary logarithm of the odds score: The summation of all positive pedigree LOD scores (statistical estimates of whether two genetic loci are physically near enough to each other on a particular chromosome that they are likely to be inherited together) at each point in the genome. Also called sumLOD score.
surveillance: In medicine, the ongoing evaluation of an individual who has an increased risk of developing a disease or who has a disease that appears to be clinically stable or not progressing. Surveillance is also used to find early signs that a disease has come back. In public health, surveillance may also refer to the ongoing systematic collection and analysis of information about the incidence, prevalence, morbidity, survival, and mortality related to a disease or health-related event in a certain group of people.
susceptibility gene mutation: A genetic alteration that increases an individual’s susceptibility or predisposition to a certain disease or disorder. When such a variant (or mutation) is inherited, development of symptoms is more likely, but not certain. Also called deleterious mutation, disease-causing mutation, pathogenic variant, and predisposing mutation.
synchronous cancer: A term used to describe a new or second primary cancer that develops at the same time as the first primary cancer, either in the same organ or in a different organ with the same molecular basis. Synchronous cancer is not considered metastatic relapse.
tagging SNP: A single nucleotide polymorphism, or SNP, that is used to “tag” a particular haplotype in a region of the genome. As a subset of all of the SNPs in the genome, tagging SNPs can be extremely useful for testing the association of a marker locus with a qualitative or quantitative trait locus in that it may not be necessary to genotype all of the SNPs. Also called tagSNP.
tagSNP: A single nucleotide polymorphism, or SNP, that is used to “tag” a particular haplotype in a region of the genome. As a subset of all of the SNPs in the genome, tagSNPs can be extremely useful for testing the association of a marker locus with a qualitative or quantitative trait locus in that it may not be necessary to genotype all of the SNPs. Also called tagging SNP.
TDR: A first cousin, great-grandparent, great-aunt, great-uncle, great-niece, great-nephew, great-grandchild, half-aunt, or half-uncle of an individual. Also called third-degree relative.
telomere: The end of a chromosome. Telomeres are made of repetitive sequences of non-coding DNA that protect the chromosome from damage. Telomeres become shorter each time the cell divides.
third-degree relative: A first cousin, great-grandparent, great-aunt, great-uncle, great-niece, great-nephew, great-grandchild, half-aunt, or half-uncle of an individual. Also called TDR.
throughput: The amount of information, people, or materials that is put through a process during a specific period of time. In medicine, throughput can be used to describe the number of laboratory tests, such as genetic sequencing, performed or the number of patients seen in a clinic during a certain period of time.
TNBC: TNBC is defined by a lack of expression of estrogen receptor (ER), progesterone receptor (PR), and human epidermal growth factor receptor 2 (HER2/neu). Also called ER-negative PR-negative HER2/neu-negative breast cancer and triple-negative breast cancer.
transcription: The process of synthesizing messenger RNA (mRNA) from DNA.
  More Information
  - Transcription (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Transcription)
translation: The process of synthesizing an amino acid sequence (protein product) from the messenger RNA (mRNA) code.
  More Information
  - Translation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Translation)
translocation: A type of chromosomal abnormality in which a chromosome breaks and a portion of it reattaches to a different chromosomal location.
  More Information
  - Translocation (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Translocation)
trichilemmoma: A benign tumor arising from the outer cells of the hair follicle.
trinucleotide repeat: A sequence of three nucleotides that is repeated a number of times in a row in a segment of DNA. A certain amount of variation in the number of trinucleotide repeats is common and usually does not cause disease in individuals. But too many copies of certain trinucleotide repeats in the DNA can affect the gene's function, which could lead to certain genetic disorders. The number of trinucleotide repeats can change as the gene is passed from parent to child.
triple-negative breast cancer: Triple-negative breast cancer is defined by a lack of expression of estrogen receptor (ER), progesterone receptor (PR), and human epidermal growth factor receptor 2 (HER2/neu). Also called ER-negative PR-negative HER2/neu-negative breast cancer and TNBC.
trisomy: The presence of an extra chromosome in some or all of the body's cells. This results in a total of three copies of that chromosome instead of the normal two copies. For example, Down syndrome (trisomy 21) is caused by having three copies of chromosome 21 instead of the usual two copies.
tumor DNA sequencing: Sequencing of somatic tissue, such as tumors, refers to looking for variants in DNA that typically occur after conception. Somatic mutations can occur in any of the cells of the body except the germ cells (sperm and egg) and therefore are not passed on to children. These variants can (but do not always) cause cancer or other diseases.
tumor suppressor gene: A type of gene that regulates cell growth. When a tumor suppressor gene is mutated, uncontrolled cell growth may occur. This may contribute to the development of cancer. Also called antioncogene.
  More Information
  - Tumor Suppressor Gene (National Human Genome Research Institute) (https://www.genome.gov/genetics-glossary/Tumor-Suppressor-Gene)
unaffected individual: In genetics, describes an individual who does not have a particular phenotypic trait or disease.
unclassified variant: A variation in a genetic sequence for which the association with disease risk is unclear. Also called variant of uncertain significance, variant of unknown significance, and VUS.
uninformative result: A negative test result in an individual where a clearly deleterious mutation has not been found in any family members. The genetic risk status of such an individual must be interpreted in the context of his or her personal and family history. Also called inconclusive result and indeterminate result.
variable expressivity: Variation in the traits, signs, or symptoms that can occur in individuals with the same condition. When there is variable expressivity, the trait may vary in clinical expression from mild to severe.
variant: An alteration in the most common DNA nucleotide sequence. The term variant can be used to describe an alteration that may be benign, pathogenic, or of unknown significance. The term variant is increasingly being used in place of the term mutation.
variant of uncertain significance: A variation in a genetic sequence for which the association with disease risk is unclear. Also called unclassified variant, variant of unknown significance, and VUS.
variant of unknown significance: A variation in a genetic sequence for which the association with disease risk is unclear. Also called unclassified variant, variant of uncertain significance, and VUS.
VUS: A variation in a genetic sequence for which the association with disease risk is unclear. Also called unclassified variant, variant of uncertain significance, and variant of unknown significance.
WES: A laboratory process that is used to determine the nucleotide sequence primarily of the exonic (or protein-coding) regions of an individual’s genome and related sequences, representing approximately 1% of the complete DNA sequence. Also called whole exome sequencing and WXS.
WGS: A laboratory process that is used to determine nearly all of the approximately 3 billion nucleotides of an individual’s complete DNA sequence, including non-coding sequence. Also called whole genome sequencing.
whole exome sequencing: A laboratory process that is used to determine the nucleotide sequence primarily of the exonic (or protein-coding) regions of an individual’s genome and related sequences, representing approximately 1% of the complete DNA sequence. Also called WES and WXS.
whole genome sequencing: A laboratory process that is used to determine nearly all of the approximately 3 billion nucleotides of an individual’s complete DNA sequence, including non-coding sequence. Also called WGS.
WXS: A laboratory process that is used to determine the nucleotide sequence primarily of the exonic (or protein-coding) regions of an individual’s genome and related sequences, representing approximately 1% of the complete DNA sequence. Also called WES and whole exome sequencing.
X-linked dominant inheritance: X-linked dominant inheritance refers to genetic conditions associated with mutations in genes on the X chromosome. A single copy of the mutation is enough to cause the disease in both males (who have one X chromosome) and females (who have two X chromosomes). In some conditions, the absence of a functional gene results in the death of affected males.
X-linked recessive inheritance: X-linked recessive inheritance refers to genetic conditions associated with mutations in genes on the X chromosome. A male carrying such a mutation will be affected, because he carries only one X chromosome. A female carrying a mutation in one gene, with a normal gene on the other X chromosome, is generally unaffected.
Z-score: A score that indicates how many standard deviations a value is above or below the mean.